# Testicular Cancer Treatment (PDQ®)

Patient Version

This PDQ cancer information summary has current information about the treatment of testicular cancer. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Date Last Modified") is the date of the most recent change. The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Adult Treatment Editorial Board.

## General Information About Testicular Cancer

Key Points for This Section
- Testicular cancer is a disease in which malignant (cancer) cells form in the tissues of one or both testicles.
- Health history can affect the risk of testicular cancer.
- Signs and symptoms of testicular cancer include swelling or discomfort in the scrotum.
- Tests that examine the testicles and blood are used to diagnose testicular cancer.
- Certain factors affect prognosis (chance of recovery) and treatment options.
- Treatment for testicular cancer can cause infertility.

### Testicular cancer is a disease in which malignant (cancer) cells form in the tissues of one or both testicles.

The testicles are 2 egg-shaped glands located inside the scrotum (a sac of loose skin that lies directly below the penis). The testicles are held within the scrotum by the spermatic cord, which also contains the vas deferens and vessels and nerves of the testicles.

Anatomy of the male reproductive and urinary systems, showing the testicles, prostate, bladder, and other organs.

Anatomy of the male reproductive and urinary systems; drawing shows front and side views of ureters, lymph nodes, rectum, bladder, prostate gland, vas deferens, urethra, penis, testicles, seminal vesicle, and ejaculatory duct.

The testicles are the male sex glands and produce testosterone and sperm. Germ cells within the testicles produce immature sperm that travel through a network of tubules (tiny tubes) and larger tubes into the epididymis (a long coiled tube next to the testicles) where the sperm mature and are stored.

Almost all testicular cancers start in the germ cells. The two main types of testicular germ cell tumors are seminomas and nonseminomas. These 2 types grow and spread differently and are treated differently. Nonseminomas tend to grow and spread more quickly than seminomas. Seminomas are more sensitive to radiation. A testicular tumor that contains both seminoma and nonseminoma cells is treated as a nonseminoma.

Testicular cancer is the most common cancer in men 20 to 35 years old.

### Health history can affect the risk of testicular cancer.

Anything that increases a person's chance of getting a disease is called a risk factor. Not every person with one or more of these risk factors will develop testicular cancer, and it will develop in people who don't have any known risk factors. Talk with your doctor if you think you may be at risk. Risk factors for testicular cancer include:

- Having had an undescended testicle.
- Having had abnormal development of the testicles.
- Having a personal history of testicular cancer.
- Having a family history of testicular cancer (especially in a father or brother).
- Being White.

### Signs and symptoms of testicular cancer include swelling or discomfort in the scrotum.

These and other signs and symptoms may be caused by testicular cancer or by other conditions. Check with your doctor if you have any of the following:

- A painless lump or swelling in either testicle.
- A change in how the testicle feels.
- A dull ache in the lower abdomen or the groin.
- A sudden build-up of fluid in the scrotum.
- Pain or discomfort in a testicle or in the scrotum.

### Tests that examine the testicles and blood are used to diagnose testicular cancer.

In addition to asking about your personal and family health history and doing a physical exam, your doctor may perform the following tests and procedures:

- Physical exam of the testes: An exam in which a doctor checks for lumps, swelling, or pain in the testicles.
- Ultrasound exam of the testes: A procedure in which high-energy sound waves (ultrasound) are bounced off internal tissues or organs and make echoes. The echoes form a picture of body tissues called a sonogram.
- Serum tumor marker test: A procedure in which a sample of blood is examined to measure the amounts of certain substances released into the blood by organs, tissues, or tumor cells in the body. Certain substances are linked to specific types of cancer when found in increased levels in the blood. These are called tumor markers. The following tumor markers are used to detect testicular cancer:
  - Alpha-fetoprotein (AFP).
  - Beta-human chorionic gonadotropin (beta-hCG).
  Tumor marker levels are measured before inguinal orchiectomy and biopsy, to help diagnose testicular cancer.
- Inguinal orchiectomy: A procedure to remove the entire testicle through an incision in the groin. A tissue sample from the testicle is then viewed under a microscope to check for cancer cells. (The surgeon does not cut through the scrotum into the testicle to remove a sample of tissue for biopsy, because if cancer is present, this procedure could cause it to spread into the scrotum and lymph nodes. It's important to choose a surgeon who has experience with this kind of surgery.) If cancer is found, the cell type (seminoma or nonseminoma) is determined in order to help plan treatment.

### Certain factors affect prognosis (chance of recovery) and treatment options.

The prognosis and treatment options depend on the following:

- Stage of the cancer (whether it is in or near the testicle or has spread to other places in the body, and blood levels of AFP, beta-hCG, and LDH).
- Type of cancer.
- Size of the tumor.
- Number and size of retroperitoneal lymph nodes.

Testicular cancer can usually be cured in patients who receive adjuvant chemotherapy or radiation therapy after their primary treatment.

### Treatment for testicular cancer can cause infertility.

Certain treatments for testicular cancer can cause infertility that may be permanent. Patients who may wish to have children should consider sperm banking before having treatment. Sperm banking is the process of freezing sperm and storing it for later use.

## Stages of Testicular Cancer

Key Points for This Section
- After testicular cancer has been diagnosed, tests are done to find out if cancer cells have spread within the testicles or to other parts of the body.
- There are three ways that cancer spreads in the body.
- Cancer may spread from where it began to other parts of the body.
- The following stages are used for testicular cancer:
  - Stage 0
  - Stage I
  - Stage II
  - Stage III
- Testicular cancer can recur (come back) after it has been treated.

### After testicular cancer has been diagnosed, tests are done to find out if cancer cells have spread within the testicles or to other parts of the body.

The process used to find out if cancer has spread within the testicles or to other parts of the body is called staging. The information gathered from the staging process determines the stage of the disease. It is important to know the stage in order to plan treatment.

The following tests and procedures may be used in the staging process:

- Chest x-ray: An x-ray of the organs and bones inside the chest. An x-ray is a type of energy beam that can go through the body and onto film, making a picture of areas inside the body.
- CT scan (CAT scan): A procedure that makes a series of detailed pictures of areas inside the body, such as the abdomen, taken from different angles. The pictures are made by a computer linked to an x-ray machine. A dye may be injected into a vein or swallowed to help the organs or tissues show up more clearly. This procedure is also called computed tomography, computerized tomography, or computerized axial tomography.
- MRI (magnetic resonance imaging): A procedure that uses a magnet, radio waves, and a computer to make a series of detailed pictures of areas inside the body, such as the abdomen. This procedure is also called nuclear magnetic resonance imaging (NMRI).
- Abdominal lymph node dissection: A surgical procedure in which lymph nodes in the abdomen are removed and a sample of tissue is checked under a microscope for signs of cancer. This procedure is also called lymphadenectomy. For patients with nonseminoma, removing the lymph nodes may help stop the spread of disease. Cancer cells in the lymph nodes of seminoma patients can be treated with radiation therapy.
- Serum tumor marker test: A procedure in which a sample of blood is examined to measure the amounts of certain substances released into the blood by organs, tissues, or tumor cells in the body. Certain substances are linked to specific types of cancer when found in increased levels in the blood. These are called tumor markers. The following 3 tumor markers are used in staging testicular cancer:
  - Alpha-fetoprotein (AFP)
  - Beta-human chorionic gonadotropin (beta-hCG).
  - Lactate dehydrogenase (LDH).
  Tumor marker levels are measured again, after inguinal orchiectomy and biopsy, in order to determine the stage of the cancer. This helps to show if all of the cancer has been removed or if more treatment is needed. Tumor marker levels are also measured during follow-up as a way of checking if the cancer has come back.

### There are three ways that cancer spreads in the body.

Cancer can spread through tissue, the lymph system, and the blood:

- Tissue. The cancer spreads from where it began by growing into nearby areas.
- Lymph system. The cancer spreads from where it began by getting into the lymph system. The cancer travels through the lymph vessels to other parts of the body.
- Blood. The cancer spreads from where it began by getting into the blood. The cancer travels through the blood vessels to other parts of the body.

### Cancer may spread from where it began to other parts of the body.

When cancer spreads to another part of the body, it is called metastasis. Cancer cells break away from where they began (the primary tumor) and travel through the lymph system or blood.

- Lymph system. The cancer gets into the lymph system, travels through the lymph vessels, and forms a tumor (metastatic tumor) in another part of the body.
- Blood. The cancer gets into the blood, travels through the blood vessels, and forms a tumor (metastatic tumor) in another part of the body.

The metastatic tumor is the same type of cancer as the primary tumor. For example, if testicular cancer spreads to the lung, the cancer cells in the lung are actually testicular cancer cells. The disease is metastatic testicular cancer, not lung cancer.

metastasis: how cancer spreads

Many cancer deaths are caused when cancer moves from the original tumor and spreads to other tissues and organs. This is called metastatic cancer. This animation shows how cancer cells travel from the place in the body where they first formed to other parts of the body.

YouTube (https://www.youtube.com/watch?v=fQwar_-QdiQ)

### The following stages are used for testicular cancer:

#### Stage 0

In stage 0, abnormal cells are found in the tiny tubules where the sperm cells begin to develop. These abnormal cells may become cancer and spread into nearby normal tissue. All tumor marker levels are normal. Stage 0 is also called germ cell neoplasia in situ.

#### Stage I

In stage I, cancer has formed. Stage I is divided into stages IA, IB, and IS.

- In stage IA, cancer is found in the testicle, including the rete testis, but has not spread to the blood vessels or lymph vessels in the testicle.
  All tumor marker levels are normal.
- In stage IB, cancer:
  - is found in the testicle, including the rete testis, and has spread to the blood vessels or lymph vessels in the testicle; or
  - has spread into the hilar soft tissue (tissue made of fibers and fat with blood vessels and lymph vessels), the epididymis, or the outer membranes around the testicle; or
  - has spread to the spermatic cord; or
  - has spread to the scrotum.
  All tumor marker levels are normal.
- In stage IS, cancer is found anywhere in the testicle and may have spread into the spermatic cord or scrotum.
  Tumor marker levels range from slightly above normal to high.

Tumor sizes are often measured in centimeters (cm) or inches. Common food items that can be used to show tumor size in cm include: a pea (1 cm), a peanut (2 cm), a grape (3 cm), a walnut (4 cm), a lime (5 cm or 2 inches), an egg (6 cm), a peach (7 cm), and a grapefruit (10 cm or 4 inches).

Drawing shows different sizes of a tumor in centimeters (cm) compared to the size of a pea (1 cm), a peanut (2 cm), a grape (3 cm), a walnut (4 cm), a lime (5 cm), an egg (6 cm), a peach (7 cm), and a grapefruit (10 cm). Also shown is a 10-cm ruler and a 4-inch ruler.

#### Stage II

Stage II is divided into stages IIA, IIB, and IIC.

- In stage IIA, cancer is found anywhere in the testicle and may have spread into the spermatic cord or scrotum. Cancer has spread to 1 to 5 nearby lymph nodes and the lymph nodes are 2 centimeters or smaller.
  All tumor marker levels are normal or slightly above normal.
- In stage IIB, cancer is found anywhere in the testicle and may have spread into the spermatic cord or scrotum. Cancer has spread to:
  - 1 nearby lymph node and the lymph node is larger than 2 centimeters but not larger than 5 centimeters; or
  - more than 5 nearby lymph nodes and the lymph nodes are not larger than 5 centimeters; or
  - a nearby lymph node and the cancer has spread outside the lymph node.
  All tumor marker levels are normal or slightly above normal.
- In stage IIC, cancer is found anywhere in the testicle and may have spread into the spermatic cord or scrotum. Cancer has spread to a nearby lymph node and the lymph node is larger than 5 centimeters.
  All tumor marker levels are normal or slightly above normal.

#### Stage III

Stage III is divided into stages IIIA, IIIB, and IIIC.

- In stage IIIA, cancer is found anywhere in the testicle and may have spread into the spermatic cord or scrotum. Cancer may have spread to one or more nearby lymph nodes. Cancer has spread to distant lymph nodes or to the lungs.
  All tumor marker levels are normal or slightly above normal.
- In stage IIIB, cancer is found anywhere in the testicle and may have spread into the spermatic cord or scrotum. Cancer has spread:
  - to one or more nearby lymph nodes and has not spread to other parts of the body; or
  - to one or more nearby lymph nodes. Cancer has spread to distant lymph nodes or to the lungs.
  The level of one or more tumor markers is moderately above normal.
- In stage IIIC, cancer is found anywhere in the testicle and may have spread into the spermatic cord or scrotum. Cancer has spread:
  - to one or more nearby lymph nodes and has not spread to other parts of the body; or
  - to one or more nearby lymph nodes. Cancer has spread to distant lymph nodes or to the lungs.
  The level of one or more tumor markers is high.
  or
  Cancer is found anywhere in the testicle and may have spread into the spermatic cord or scrotum. Cancer has not spread to distant lymph nodes or the lung, but has spread to other parts of the body, such as the liver or bone.
  Tumor marker levels may range from normal to high.

### Testicular cancer can recur (come back) after it has been treated.

The cancer may come back many years after the initial cancer, in the other testicle or in other parts of the body.

## Treatment Option Overview

Key Points for This Section
- There are different types of treatment for patients with testicular cancer.
- Testicular tumors are divided into 3 groups, based on how well the tumors are expected to respond to treatment.
  - Good Prognosis
  - Intermediate Prognosis
  - Poor Prognosis
- The following types of treatment are used:
  - Surgery
  - Radiation therapy
  - Chemotherapy
  - Surveillance
  - High-dose chemotherapy with stem cell transplant
- New types of treatment are being tested in clinical trials.
- Treatment for testicular cancer may cause side effects.
- Patients may want to think about taking part in a clinical trial.
- Patients can enter clinical trials before, during, or after starting their cancer treatment.
- Follow-up tests may be needed.

### There are different types of treatment for patients with testicular cancer.

Different types of treatments are available for patients with testicular cancer. Some treatments are standard (the currently used treatment), and some are being tested in clinical trials. A treatment clinical trial is a research study meant to help improve current treatments or obtain information on new treatments for patients with cancer. When clinical trials show that a new treatment is better than the standard treatment, the new treatment may become the standard treatment. Patients may want to think about taking part in a clinical trial. Some clinical trials are open only to patients who have not started treatment.

### Testicular tumors are divided into 3 groups, based on how well the tumors are expected to respond to treatment.

#### Good Prognosis

For nonseminoma, all of the following must be true:

- The tumor is found only in the testicle or in the retroperitoneum (area outside or behind the abdominal wall); and
- The tumor has not spread to organs other than the lungs; and
- The levels of all the tumor markers are slightly above normal.

For seminoma, all of the following must be true:

- The tumor has not spread to organs other than the lungs; and
- The level of alpha-fetoprotein (AFP) is normal. Beta-human chorionic gonadotropin (beta-hCG) and lactate dehydrogenase (LDH) may be at any level.

#### Intermediate Prognosis

For nonseminoma, all of the following must be true:

- The tumor is found in one testicle only or in the retroperitoneum (area outside or behind the abdominal wall); and
- The tumor has not spread to organs other than the lungs; and
- The level of any one of the tumor markers is more than slightly above normal.

For seminoma, all of the following must be true:

- The tumor has spread to organs other than the lungs; and
- The level of AFP is normal. Beta-hCG and LDH may be at any level.

#### Poor Prognosis

For nonseminoma, at least one of the following must be true:

- The tumor is in the center of the chest between the lungs; or
- The tumor has spread to organs other than the lungs; or
- The level of any one of the tumor markers is high.

There is no poor prognosis grouping for seminoma testicular tumors.

### The following types of treatment are used:

#### Surgery

Surgery to remove the testicle (inguinal orchiectomy) and some of the lymph nodes may be done at diagnosis and staging. (See the General Information and Stages sections of this summary.) Tumors that have spread to other places in the body may be partly or entirely removed by surgery.

After the doctor removes all the cancer that can be seen at the time of the surgery, some patients may be given chemotherapy or radiation therapy after surgery to kill any cancer cells that are left. Treatment given after the surgery, to lower the risk that the cancer will come back, is called adjuvant therapy.

#### Radiation therapy

Radiation therapy is a cancer treatment that uses high-energy x-rays or other types of radiation to kill cancer cells or keep them from growing. External radiation therapy uses a machine outside the body to send radiation toward the area of the body with cancer.

#### Chemotherapy

Chemotherapy is a cancer treatment that uses drugs to stop the growth of cancer cells, either by killing the cells or by stopping the cells from dividing. When chemotherapy is taken by mouth or injected into a vein or muscle, the drugs enter the bloodstream and can reach cancer cells throughout the body (systemic chemotherapy).

See Drugs Approved for Testicular Cancer (https://www.cancer.gov/about-cancer/treatment/drugs/testicular) for more information.

#### Surveillance

Surveillance is closely following a patient's condition without giving any treatment unless there are changes in test results. It is used to find early signs that the cancer has recurred (come back). In surveillance, patients are given certain exams and tests on a regular schedule.

#### High-dose chemotherapy with stem cell transplant

High doses of chemotherapy are given to kill cancer cells. Healthy cells, including blood-forming cells, are also destroyed by the cancer treatment. Stem cell transplant is a treatment to replace the blood-forming cells. Stem cells (immature blood cells) are removed from the blood or bone marrow of the patient or a donor and are frozen and stored. After the patient completes chemotherapy, the stored stem cells are thawed and given back to the patient through an infusion. These reinfused stem cells grow into (and restore) the body's blood cells.

See Drugs Approved for Testicular Cancer (https://www.cancer.gov/about-cancer/treatment/drugs/testicular) for more information.

Donor stem cell transplant. (Step 1): Four to five days before donor stem cell collection, the donor receives a medicine to increase the number of stem cells circulating through their bloodstream (not shown). The blood-forming stem cells are then collected from the donor through a large vein in their arm. The blood flows through an apheresis machine that removes the stem cells. The rest of the blood is returned to the donor through a vein in their other arm. (Step 2): The patient receives chemotherapy to kill cancer cells and prepare their body for the donor stem cells. The patient may also receive radiation therapy (not shown). (Step 3): The patient receives an infusion of the donor stem cells.

Donor stem cell transplant; (Panel 1): Drawing of stem cells being collected from a donor's bloodstream using an apheresis machine. Blood is removed from a vein in the donor's arm and flows through the machine where the stem cells are removed. The rest of the blood is then returned to the donor through a vein in their other arm. (Panel 2): Drawing of a health care provider giving a patient an infusion of chemotherapy through a catheter in the patient's chest. The chemotherapy is given to kill cancer cells and prepare the patient's body for the donor stem cells. (Panel 3): Drawing of a patient receiving an infusion of the donor stem cells through a catheter in the chest.

### New types of treatment are being tested in clinical trials.

Information about clinical trials is available from the NCI website (https://www.cancer.gov/research/participate/clinical-trials).

### Treatment for testicular cancer may cause side effects.

For information about side effects caused by treatment for cancer, visit our Side Effects (https://www.cancer.gov/about-cancer/treatment/side-effects) page.

### Patients may want to think about taking part in a clinical trial.

For some patients, taking part in a clinical trial may be the best treatment choice. Clinical trials are part of the cancer research process. Clinical trials are done to find out if new cancer treatments are safe and effective or better than the standard treatment.

Many of today's standard treatments for cancer are based on earlier clinical trials. Patients who take part in a clinical trial may receive the standard treatment or be among the first to receive a new treatment.

Patients who take part in clinical trials also help improve the way cancer will be treated in the future. Even when clinical trials do not lead to effective new treatments, they often answer important questions and help move research forward.

### Patients can enter clinical trials before, during, or after starting their cancer treatment.

Some clinical trials only include patients who have not yet received treatment. Other trials test treatments for patients whose cancer has not gotten better. There are also clinical trials that test new ways to stop cancer from recurring (coming back) or reduce the side effects of cancer treatment.

Clinical trials are taking place in many parts of the country. Information about clinical trials supported by NCI can be found on NCI’s clinical trials search (https://www.cancer.gov/research/participate/clinical-trials-search) webpage. Clinical trials supported by other organizations can be found on the ClinicalTrials.gov website.

### Follow-up tests may be needed.

As you go through treatment, you will have follow-up tests or check-ups. Some tests that were done to diagnose or stage the cancer may be repeated to see how well the treatment is working. Decisions about whether to continue, change, or stop treatment may be based on the results of these tests.

Some of the tests will continue to be done from time to time after treatment has ended. The results of these tests can show if your condition has changed or if the cancer has recurred (come back).

Men who have had testicular cancer have an increased risk of developing cancer in the other testicle. A patient is advised to regularly check the other testicle and report any unusual symptoms to a doctor right away.

Long-term clinical exams are very important. The patient will probably have check-ups frequently during the first year after surgery and less often after that.

## Treatment of Stage 0 (Testicular Intraepithelial Neoplasia)

For information about the treatments listed below, see the Treatment Option Overview section.

Treatment of stage 0 may include the following:

- Radiation therapy.
- Surveillance.
- Surgery to remove the testicle.

Use our clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials that are accepting patients. You can search for trials based on the type of cancer, the age of the patient, and where the trials are being done. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

## Treatment of Stage I Testicular Cancer

For information about the treatments listed below, see the Treatment Option Overview section.

Treatment of stage I testicular cancer depends on whether the cancer is a seminoma or a nonseminoma.

Treatment of seminoma may include the following:

- Surgery to remove the testicle, followed by surveillance.
- For patients who want active treatment rather than surveillance, treatment may include:
  - Surgery to remove the testicle, followed by chemotherapy.

Treatment of nonseminoma may include the following:

- Surgery to remove the testicle, with long-term follow-up.
- Surgery to remove the testicle and lymph nodes in the abdomen, with long-term follow-up.
- Surgery followed by chemotherapy for patients at high risk of recurrence, with long-term follow-up.

Use our clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials that are accepting patients. You can search for trials based on the type of cancer, the age of the patient, and where the trials are being done. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

## Treatment of Stage II Testicular Cancer

For information about the treatments listed below, see the Treatment Option Overview section.

Treatment of stage II testicular cancer depends on whether the cancer is a seminoma or a nonseminoma.

Treatment of seminoma may include the following:

- When the tumor is 5 centimeters or smaller:
  - Surgery to remove the testicle, followed by radiation therapy to lymph nodes in the abdomen and pelvis.
  - Combination chemotherapy.
  - Surgery to remove the testicle and lymph nodes in the abdomen.
- When the tumor is larger than 5 centimeters:
  - Surgery to remove the testicle, followed by combination chemotherapy or radiation therapy to lymph nodes in the abdomen and pelvis, with long-term follow-up.

Treatment of nonseminoma may include the following:

- Surgery to remove the testicle and lymph nodes, with long-term follow-up.
- Surgery to remove the testicle and lymph nodes, followed by combination chemotherapy and long-term follow-up.
- Surgery to remove the testicle, followed by combination chemotherapy and a second surgery if cancer remains, with long-term follow-up.
- Combination chemotherapy before surgery to remove the testicle, for cancer that has spread and is thought to be life-threatening.

Use our clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials that are accepting patients. You can search for trials based on the type of cancer, the age of the patient, and where the trials are being done. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

## Treatment of Stage III Testicular Cancer

For information about the treatments listed below, see the Treatment Option Overview section.

Treatment of stage III testicular cancer depends on whether the cancer is a seminoma or a nonseminoma.

Treatment of seminoma may include the following:

- Surgery to remove the testicle, followed by combination chemotherapy. If there are tumors remaining after chemotherapy, treatment may be one of the following:
  - Surveillance with no treatment unless tumors grow.
  - Surveillance for tumors smaller than 3 centimeters and surgery to remove tumors larger than 3 centimeters.
  - A PET scan two months after chemotherapy and surgery to remove tumors that show up with cancer on the scan.
- A clinical trial of chemotherapy.

Treatment of nonseminoma may include the following:

- Surgery to remove the testicle, followed by combination chemotherapy.
- Combination chemotherapy followed by surgery to remove the testicle and all remaining tumors. Additional chemotherapy may be given if the tumor tissue removed contains cancer cells that are growing or if follow-up tests show that cancer is progressing.
- Combination chemotherapy before surgery to remove the testicle, for cancer that has spread and is thought to be life-threatening.
- A clinical trial of chemotherapy.

Use our clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials that are accepting patients. You can search for trials based on the type of cancer, the age of the patient, and where the trials are being done. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

## Treatment of Recurrent Testicular Cancer

For information about the treatments listed below, see the Treatment Option Overview section.

Treatment of recurrent testicular cancer may include the following:

- Combination chemotherapy.
- High-dose chemotherapy and stem cell transplant.
- Surgery to remove cancer that has either:
  - come back more than 2 years after complete remission; or
  - come back in only one place and does not respond to chemotherapy.
- A clinical trial of a new therapy.

Use our clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials that are accepting patients. You can search for trials based on the type of cancer, the age of the patient, and where the trials are being done. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

## To Learn More About Testicular Cancer

For more information from the National Cancer Institute about testicular cancer, see the following:

- Testicular Cancer Home Page (https://www.cancer.gov/types/testicular)
- Testicular Cancer Screening
- Drugs Approved for Testicular Cancer (https://www.cancer.gov/about-cancer/treatment/drugs/testicular)

For general cancer information and other resources from the National Cancer Institute, visit:

- About Cancer (https://www.cancer.gov/about-cancer)
- Cancer Staging (https://www.cancer.gov/about-cancer/diagnosis-staging/staging)
- Chemotherapy and You: Support for People With Cancer (https://www.cancer.gov/publications/patient-education/chemo-and-you)
- Radiation Therapy and You: Support for People With Cancer (https://www.cancer.gov/publications/patient-education/radiation-therapy-and-you)
- Coping with Cancer (https://www.cancer.gov/about-cancer/coping)
- Questions to Ask Your Doctor about Cancer (https://www.cancer.gov/about-cancer/coping/questions)
- For Survivors, Caregivers, and Advocates (https://cancercontrol.cancer.gov/ocs/resources/survivors.html)

## About This PDQ Summary

### About PDQ

Physician Data Query (PDQ) is the National Cancer Institute's (NCI's) comprehensive cancer information database. The PDQ database contains summaries of the latest published information on cancer prevention, detection, genetics, treatment, supportive care, and complementary and alternative medicine. Most summaries come in two versions. The health professional versions have detailed information written in technical language. The patient versions are written in easy-to-understand, nontechnical language. Both versions have cancer information that is accurate and up to date and most versions are also available in Spanish (https://www.cancer.gov/espanol/publicaciones/pdq).

PDQ is a service of the NCI. The NCI is part of the National Institutes of Health (NIH). NIH is the federal government’s center of biomedical research. The PDQ summaries are based on an independent review of the medical literature. They are not policy statements of the NCI or the NIH.

### Purpose of This Summary

This PDQ cancer information summary has current information about the treatment of testicular cancer. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

### Reviewers and Updates

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Updated") is the date of the most recent change.

The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Adult Treatment Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/adult-treatment).

### Clinical Trial Information

A clinical trial is a study to answer a scientific question, such as whether one treatment is better than another. Trials are based on past studies and what has been learned in the laboratory. Each trial answers certain scientific questions in order to find new and better ways to help cancer patients. During treatment clinical trials, information is collected about the effects of a new treatment and how well it works. If a clinical trial shows that a new treatment is better than one currently being used, the new treatment may become "standard." Patients may want to think about taking part in a clinical trial. Some clinical trials are open only to patients who have not started treatment.

Clinical trials can be found online at NCI's website (https://www.cancer.gov/research/participate/clinical-trials). For more information, call the Cancer Information Service (https://www.cancer.gov/contact/contact-center) (CIS), NCI's contact center, at 1-800-4-CANCER (1-800-422-6237).

### Permission to Use This Summary

PDQ is a registered trademark. The content of PDQ documents can be used freely as text. It cannot be identified as an NCI PDQ cancer information summary unless the whole summary is shown and it is updated regularly. However, a user would be allowed to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks in the following way: [include excerpt from the summary].”

The best way to cite this PDQ summary is:

PDQ® Adult Treatment Editorial Board. PDQ Testicular Cancer Treatment. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/types/testicular/patient/testicular-treatment-pdq. Accessed <MM/DD/YYYY>. [PMID: 26389286]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use in the PDQ summaries only. If you want to use an image from a PDQ summary and you are not using the whole summary, you must get permission from the owner. It cannot be given by the National Cancer Institute. Information about using the images in this summary, along with many other images related to cancer can be found in Visuals Online (https://visualsonline.cancer.gov/). Visuals Online is a collection of more than 3,000 scientific images.

### Disclaimer

The information in these summaries should not be used to make decisions about insurance reimbursement. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s E-mail Us (https://www.cancer.gov/contact/email-us).